# Adrenocortical Carcinoma Treatment (PDQ®)

Health Professional Version

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about the treatment of adult adrenocortical carcinoma. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

This summary is reviewed regularly and updated as necessary by the PDQ Adult Treatment Editorial Board, which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

## General Information About Adrenocortical Carcinoma

### Incidence and Mortality

Adrenocortical carcinoma (ACC) is a rare tumor with an annual incidence of 2 cases per 1 million people.[1] Although it mainly occurs in adults, children may be affected. The median age at diagnosis is 46 years. Historically, about 30% of these malignancies are confined to the adrenal gland at diagnosis.[2] However, more ACCs are being diagnosed at early stages, most likely because of the widespread use of high-quality imaging techniques.

### Prognostic Factors

Retrospective studies have identified the following three important prognostic factors:[3]

- Completeness of resection.
- Stage of disease.
- Pathological grade.

Patients who have low-grade tumors without evidence of invasion into local tissues or spread to lymph nodes have an improved prognosis. The role of other prognostic indicators is controversial.

### Clinical Features

In approximately 60% of patients, symptoms related to excessive hormone secretion are the main reason for seeking medical attention. Biochemical hormone testing reveals that up to 80% of tumors are functioning. The second most common symptoms at time of initial presentation are unspecific abdominal symptoms, such as abdominal pain or fullness. A small percentage of ACCs are incidentally discovered when imaging studies are conducted for reasons other than potential adrenal disease.

### Diagnosis

Initial evaluation should include careful endocrine studies to reveal any excessive hormone production by the tumor, which can serve as a tumor marker during therapy. Staging should include imaging of the primary site by computed tomography (CT) and/or magnetic resonance imaging of the abdomen. In addition, a CT of the chest is necessary to assess potential lung metastasis. Although the use of positron emission tomography may be effective in identifying unsuspected sites of metastases, its role as a staging tool is unclear. The detection of metastatic lesions may allow effective palliation of both functioning and nonfunctioning tumors.

### Prognosis and Survival

The most common sites of metastases are the lung, liver, peritoneum, and, less commonly, the bones and major veins. Palliation of metastatic functioning tumors may be achieved by resection of both the primary tumor and metastatic lesions. Unresectable or widely disseminated tumors may be palliated by adrenolytic therapy with mitotane, antihormonal drugs (i.e., ketoconazole and metyrapone), systemic chemotherapy, and/or radiation therapy. However, 5-year survival rates for patients with stage IV tumors are usually less than 20%.[2]

Although several studies have shown partial or even complete remission, there is no convincing evidence that systemic therapy improves the survival duration of patients with adrenal cancer. Radical open surgical excision is the treatment of choice for patients with localized malignancies and remains the only method for achieving long-term disease-free survival.[4] Overall 5-year survival rates are approximately 38% to 46%.[1,2]

### References

Bilimoria KY, Shen WT, Elaraj D, et al.: Adrenocortical carcinoma in the United States: treatment utilization and prognostic factors. Cancer 113 (11): 3130-6, 2008.18973179
Fassnacht M, Allolio B: Epidemiology of adrenocortical carcinoma. In: Hammer GD, Else T, eds.: Adrenocortical Carcinoma: Basic Science and Clinical Concepts. Springer, 2010, pp 23-9.
Miller BS, Gauger PG, Hammer GD, et al.: Proposal for modification of the ENSAT staging system for adrenocortical carcinoma using tumor grade. Langenbecks Arch Surg 395 (7): 955-61, 2010.20694732
Allolio B, Fassnacht M: Clinical review: Adrenocortical carcinoma: clinical update. J Clin Endocrinol Metab 91 (6): 2027-37, 2006.16551738

## Cellular Classification of Adrenocortical Carcinoma

Adrenocortical carcinoma (ACC) can be classified into functioning and nonfunctioning tumors by clinical and biochemical assessment. Approximately 60% of ACCs produce hormones.[1] The associated clinical syndromes include:

- Hypercortisolism (Cushing syndrome).
- Hirsutism/virilization.
- Feminization.
- Precocious puberty.
- Hyperaldosteronism.

Biochemical assessment aims to detect increased levels of cortisol (24-hour urine, 1 mg dexamethasone suppression test, serum adrenocorticotropic hormone and cortisol), androgens (dehydroepiandrosterone sulfate, testosterone), estrogens (estradiol), and mineralocorticoids (renin, aldosterone).

Pathological assessment can differentiate high-grade and low-grade tumors according to the mitotic activity of the tumor. The Weiss score can differentiate benign and malignant adrenocortical tumors, based on several histopathological criteria, including:[2]

- Nuclear grade.
- Number of mitoses.
- Presence of atypical mitosis.
- Percentage of clear cells.
- Diffuse architecture.
- Necrosis.
- Venous invasion.
- Sinusoidal invasion.
- Capsular invasion.

### References

Allolio B, Fassnacht M: Clinical presentation and initial diagnosis. In: Hammer GD, Else T, eds.: Adrenocortical Carcinoma: Basic Science and Clinical Concepts. Springer, 2010, pp 31-47.
Weiss LM, Medeiros LJ, Vickery AL: Pathologic features of prognostic significance in adrenocortical carcinoma. Am J Surg Pathol 13 (3): 202-6, 1989.2919718

## Stage Information for Adrenocortical Carcinoma

Several staging systems for adrenocortical carcinoma (ACC) are in use.

The American Joint Committee on Cancer (AJCC) defines ACC stage by the size of the primary tumor, the degree of local invasion, and whether it has spread to regional lymph nodes or distant sites.[1] Proper staging should include computed tomography (CT) of the abdomen and chest. Magnetic resonance imaging (MRI) may add specificity to CT evaluation of an adrenal mass.[2] In-phase and out-of-phase T1-weighted imaging may be the most effective noninvasive method to differentiate benign from malignant adrenal masses. MRI may suggest evidence of extracapsular tumor invasion, extension into the vena cava, or metastases. Patency of surrounding vessels can often be demonstrated with gadolinium-enhanced sequences or flip-angle techniques.[3]

In addition to AJCC staging, the European Network for the Study of Adrenal Tumors (ENSAT) staging system is widely used internationally.[4] The ENSAT staging system is essentially the same as the AJCC system, but reserves stage IV only for tumors with distant metastasis. Other staging systems include the classical Macfarlane system, modified by Sullivan, and the Union Internationale Contre le Cancer staging system, published by the World Health Organization.[5]

### AJCC Stage Groupings and TNM Definitions

The AJCC has designated staging by TNM (tumor, node, metastasis) to define ACC.[1]

Table 1. Definitions of TNM Stage I^a^

Stage | TNM | Description
I | T1, N0, M0 | T1 = Tumor ≤5 cm in greatest dimension, no extra-adrenal invasion.
I | T1, N0, M0 | N0 = No regional lymph node metastasis.
I | T1, N0, M0 | M0 = No distant metastasis.

T = primary tumor; N = regional lymph node; M = distant metastasis.

^a^Reprinted with permission from AJCC: Adrenal Cortical Carcinoma. In: Amin MB, Edge SB, Greene FL, et al., eds.: AJCC Cancer Staging Manual. 8th ed. New York, NY: Springer, 2017, pp. 911–8.

Table 2. Definitions of TNM Stage II^a^

Stage | TNM | Description
II | T2, N0, M0 | T2 = Tumor >5 cm, no extra-adrenal invasion.
II | T2, N0, M0 | N0 = No regional lymph node metastasis.
II | T2, N0, M0 | M0 = No distant metastasis.

T = primary tumor; N = regional lymph node; M = distant metastasis.

^a^Reprinted with permission from AJCC: Adrenal Cortical Carcinoma. In: Amin MB, Edge SB, Greene FL, et al., eds.: AJCC Cancer Staging Manual. 8th ed. New York, NY: Springer, 2017, pp. 911–8.

Table 3. Definitions of TNM Stage III^a^

Stage | TNM | Description
III | T1, N1, M0 | T1 = Tumor ≤5 cm in greatest dimension, no extra-adrenal invasion.
III | T1, N1, M0 | N1 = Metastasis in regional lymph node(s).
III | T1, N1, M0 | M0 = No distant metastasis.
III | T2, N1, M0 | T2 = Tumor >5 cm, no extra-adrenal invasion.
III | T2, N1, M0 | N1 = Metastasis in regional lymph node(s).
III | T2, N1, M0 | M0 = No distant metastasis.
III | T3, Any N, M0 | T3 = Tumor of any size with local invasion but not invading adjacent organs.
III | T3, Any N, M0 | NX = Regional lymph nodes cannot be assessed.
III | T3, Any N, M0 | N0 = No regional lymph node metastasis.
III | T3, Any N, M0 | N1 = Metastasis in regional lymph node(s).
III | T3, Any N, M0 | M0 = No distant metastasis.
III | T4, Any N, M0 | T4 = Tumor of any size that invades adjacent organs (kidney, diaphragm, pancreas, spleen, or liver) or large blood vessels (renal vein or vena cava).
III | T4, Any N, M0 | Any N = See descriptions in this table, T3, Any N, M0.
III | T4, Any N, M0 | M0 = No distant metastasis.

T = primary tumor; N = regional lymph node; M = distant metastasis.

^a^Reprinted with permission from AJCC: Adrenal Cortical Carcinoma. In: Amin MB, Edge SB, Greene FL, et al., eds.: AJCC Cancer Staging Manual. 8th ed. New York, NY: Springer, 2017, pp. 911–8.

Table 4. Definitions of TNM Stage IV^a^

Stage | TNM | Description
IV | Any T, Any N, M1 | TX = Primary tumor cannot be assessed.
IV | Any T, Any N, M1 | T0 = No evidence of primary tumor.
IV | Any T, Any N, M1 | T1 = Tumor ≤5 cm in greatest dimension, no extra-adrenal invasion.
IV | Any T, Any N, M1 | T2 = Tumor >5 cm, no extra-adrenal invasion.
IV | Any T, Any N, M1 | T3 = Tumor of any size with local invasion but not invading adjacent organs.
IV | Any T, Any N, M1 | T4 = Tumor of any size that invades adjacent organs (kidney, diaphragm, pancreas, spleen, or liver) or large blood vessels (renal vein or vena cava).
IV | Any T, Any N, M1 | Any N = See descriptions in Table 3, Stage III.
IV | Any T, Any N, M1 | M1 = Distant metastasis.

T = primary tumor; N = regional lymph node; M = distant metastasis.

^a^Reprinted with permission from AJCC: Adrenal Cortical Carcinoma. In: Amin MB, Edge SB, Greene FL, et al., eds.: AJCC Cancer Staging Manual. 8th ed. New York, NY: Springer, 2017, pp. 911–8.

### References

Adrenal Cortical Carcinoma. In: Amin MB, Edge SB, Greene FL, et al., eds.: AJCC Cancer Staging Manual. 8th ed. Springer; 2017, pp. 911–8.
Doppman JL, Reinig JW, Dwyer AJ, et al.: Differentiation of adrenal masses by magnetic resonance imaging. Surgery 102 (6): 1018-26, 1987.3686342 88071208
Brown ED, Semelka RC: Magnetic resonance imaging of the adrenal gland and kidney. Top Magn Reson Imaging 7 (2): 90-101, 1995 Spring.7772374 95290223
Fassnacht M, Johanssen S, Quinkler M, et al.: Limited prognostic value of the 2004 International Union Against Cancer staging classification for adrenocortical carcinoma: proposal for a Revised TNM Classification. Cancer 115 (2): 243-50, 2009.19025987
Allolio B, Fassnacht M: Clinical review: Adrenocortical carcinoma: clinical update. J Clin Endocrinol Metab 91 (6): 2027-37, 2006.16551738

## Treatment of Stage I Adrenocortical Carcinoma

### Treatment Options for Stage I Adrenocortical Carcinoma (ACC)

Treatment options for stage I ACC include:

1. Complete surgical removal of the tumor is the treatment of choice for patients with stage I ACC. The long-term survival of patients with nonfunctioning tumors is comparable with that of patients with functioning tumors. The removal of regional lymph nodes that are not clinically enlarged is not indicated.
2. Adjuvant mitotane (under clinical evaluation).
  Adjuvant mitotane has shown some progression-free or disease-free survival advantage, but no overall survival advantage.[1-3]

### Current Clinical Trials

Use our advanced clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search/advanced) to find NCI-supported cancer clinical trials that are now enrolling patients. The search can be narrowed by location of the trial, type of treatment, name of the drug, and other criteria. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

### References

Terzolo M, Angeli A, Fassnacht M, et al.: Adjuvant mitotane treatment for adrenocortical carcinoma. N Engl J Med 356 (23): 2372-80, 2007.17554118
Polat B, Fassnacht M, Pfreundner L, et al.: Radiotherapy in adrenocortical carcinoma. Cancer 115 (13): 2816-23, 2009.19402169
Sabolch A, Feng M, Griffith K, et al.: Adjuvant and definitive radiotherapy for adrenocortical carcinoma. Int J Radiat Oncol Biol Phys 80 (5): 1477-84, 2011.20675074

## Treatment of Stage II Adrenocortical Carcinoma

### Treatment Options for Stage II Adrenocortical Carcinoma (ACC)

Treatment options for stage II ACC include:

1. Complete surgical removal of the tumor is the treatment of choice for patients with stage II ACC. The long-term survival of patients with nonfunctioning tumors is comparable with that of patients with functioning tumors. The removal of regional lymph nodes that are not clinically enlarged is not indicated.
2. Adjuvant mitotane (under clinical evaluation).
  Adjuvant mitotane has shown some progression-free or disease-free survival advantage, no overall survival advantage.[1-3]

### Current Clinical Trials

Use our advanced clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search/advanced) to find NCI-supported cancer clinical trials that are now enrolling patients. The search can be narrowed by location of the trial, type of treatment, name of the drug, and other criteria. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

### References

Terzolo M, Angeli A, Fassnacht M, et al.: Adjuvant mitotane treatment for adrenocortical carcinoma. N Engl J Med 356 (23): 2372-80, 2007.17554118
Polat B, Fassnacht M, Pfreundner L, et al.: Radiotherapy in adrenocortical carcinoma. Cancer 115 (13): 2816-23, 2009.19402169
Sabolch A, Feng M, Griffith K, et al.: Adjuvant and definitive radiotherapy for adrenocortical carcinoma. Int J Radiat Oncol Biol Phys 80 (5): 1477-84, 2011.20675074

## Treatment of Stage III Adrenocortical Carcinoma

### Treatment Options for Stage III Adrenocortical Carcinoma (ACC)

Treatment options for stage III ACC include:

1. Complete surgical removal of the tumor, with or without regional lymph node dissection, is the treatment of choice for patients with stage III ACC. The treatment of patients who have tumors with local invasion, but without clinically enlarged regional lymph nodes, is complete surgical removal, as for stage I and stage II tumors. For those with enlarged regional lymph nodes, a lymph node dissection should be included in the procedure. These patients are at high risk of disease recurrence and should consider enrolling in a clinical trial.
2. Radiation therapy (approximately 50–70 Gy over a period of 4 weeks) may be given to patients with localized but unresectable tumors (under clinical evaluation).[1]
3. Chemotherapy with mitotane in doses as high as 10 to 12 g/day to achieve a blood level of 14 to 20 mg/L should be considered for patients unable to undergo complete resection (under clinical evaluation). This adrenolytic drug produces useful clinical responses in about 20% to 30% of patients with measurable tumor burden.[2,3]
  The role of mitotane as adjuvant therapy after complete tumor resection is still unclear but should be discussed with the patient. For patients who undergo a complete resection, the role of adjuvant mitotane and radiation therapy is the same as for patients with stage I and stage II ACC.
4. Chemotherapy with mitotane plus streptozotocin or mitotane plus etoposide, doxorubicin, and cisplatin may be effective and has been compared in a phase III clinical trial (NCT00924144 (https://www.cancer.gov/clinicaltrials/NCT00924144)) (under clinical evaluation).[2]

Many patients with functioning tumors who receive treatment experience reduced hormone production. In patients with increased hormone production, antisteroidogenic drugs, such as ketoconazole and metyrapone, and steroid receptor antagonists, such as spironolactone and mifepristone, should be considered.

Clinical trials are appropriate for newly diagnosed patients.

### Current Clinical Trials

Use our advanced clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search/advanced) to find NCI-supported cancer clinical trials that are now enrolling patients. The search can be narrowed by location of the trial, type of treatment, name of the drug, and other criteria. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

### References

Percarpio B, Knowlton AH: Radiation therapy of adrenal cortical carcinoma. Acta Radiol Ther Phys Biol 15 (4): 288-92, 1976.62490 77041584
Allolio B, Fassnacht M: Clinical review: Adrenocortical carcinoma: clinical update. J Clin Endocrinol Metab 91 (6): 2027-37, 2006.16551738
Terzolo M, Ardito A, Zaggia B, et al.: Mitotane. In: Hammer GD, Else T, eds.: Adrenocortical Carcinoma: Basic Science and Clinical Concepts. Springer, 2010, pp 369-82.

## Treatment of Stage IV Adrenocortical Carcinoma

### Treatment Options for Stage IV Adrenocortical Carcinoma (ACC)

Treatment options for stage IV ACC include:

1. Chemotherapy with mitotane.
2. Chemotherapy with mitotane plus streptozotocin or mitotane plus etoposide, doxorubicin, and cisplatin, as evidenced by the NCT00924144 (https://www.cancer.gov/clinicaltrials/NCT00924144) phase III clinical trial.[1]
3. Radiation therapy to bone metastases.
4. Surgical removal of localized metastases, particularly for tumors that are functioning.
5. Insulin-like growth factor 1 receptor–inhibitors (under clinical evaluation).
6. Gossypol (under clinical evaluation).

Temporary palliation of disseminated ACC can sometimes be achieved with the chemotherapeutic agent mitotane. Although measurable partial remissions are unusual and are reported in only 20% to 30% of patients, palliation of hormone symptoms is commonly observed. Prolonged treatment with mitotane, however, is often limited by gastrointestinal and neurological toxicity. Local recurrences and selected sites of metastatic disease can sometimes be palliated surgically or with radiation therapy.[1,2]

Two other cytotoxic chemotherapy regimens may be effective and have been compared in a phase III clinical trial:[1]

- Streptozotocin plus mitotane.
- Etoposide, doxorubicin, and cisplatin plus mitotane.

Clinical trials of other chemotherapy regimens are ongoing.

Many patients with functioning tumors who receive treatment experience reduced hormone production. In patients with increased hormone production, antisteroidogenic drugs, such as ketoconazole and metyrapone, and steroid receptor antagonists, such as spironolactone and mifepristone, should be considered.

Clinical trials, including phase I and II trials of newer chemotherapeutic and biological agents, are appropriate and should be considered.

### Current Clinical Trials

Use our advanced clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search/advanced) to find NCI-supported cancer clinical trials that are now enrolling patients. The search can be narrowed by location of the trial, type of treatment, name of the drug, and other criteria. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

### References

Allolio B, Fassnacht M: Clinical review: Adrenocortical carcinoma: clinical update. J Clin Endocrinol Metab 91 (6): 2027-37, 2006.16551738
Terzolo M, Ardito A, Zaggia B, et al.: Mitotane. In: Hammer GD, Else T, eds.: Adrenocortical Carcinoma: Basic Science and Clinical Concepts. Springer, 2010, pp 369-82.

## Treatment of Recurrent Adrenocortical Carcinoma

Deciding to treat patients with recurrent adrenocortical carcinoma (ACC), and what treatment to use, depends on many factors, including previous treatment, site of recurrence, and individual patient considerations. Local recurrence and selected sites of metastatic disease can sometimes be palliated by surgery or radiation therapy. Although recurrent ACC is not considered curable, palliation of hormonal symptoms and occasional 5-year survivals can be achieved.[1] However, substantial morbidity is associated with resection of recurrent tumors.

Clinical trials, including phase I and II trials of newer chemotherapeutic and biological agents, are appropriate and should be considered.

### Current Clinical Trials

Use our advanced clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search/advanced) to find NCI-supported cancer clinical trials that are now enrolling patients. The search can be narrowed by location of the trial, type of treatment, name of the drug, and other criteria. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

### References

Jensen JC, Pass HI, Sindelar WF, et al.: Recurrent or metastatic disease in select patients with adrenocortical carcinoma. Aggressive resection vs chemotherapy. Arch Surg 126 (4): 457-61, 1991.1706914 91181989

## Latest Updates to This Summary (12/13/2024)

The PDQ cancer information summaries are reviewed regularly and updated as new information becomes available. This section describes the latest changes made to this summary as of the date above.

Editorial changes were made to this summary.

This summary is written and maintained by the PDQ Adult Treatment Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/adult-treatment), which is editorially independent of NCI. The summary reflects an independent review of the literature and does not represent a policy statement of NCI or NIH. More information about summary policies and the role of the PDQ Editorial Boards in maintaining the PDQ summaries can be found on the About This PDQ Summary and PDQ® Cancer Information for Health Professionals (https://www.cancer.gov/publications/pdq) pages.

## About This PDQ Summary

### Purpose of This Summary

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about the treatment of adult adrenocortical carcinoma. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

### Reviewers and Updates

This summary is reviewed regularly and updated as necessary by the PDQ Adult Treatment Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/adult-treatment), which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

Board members review recently published articles each month to determine whether an article should:

- be discussed at a meeting,
- be cited with text, or
- replace or update an existing article that is already cited.

Changes to the summaries are made through a consensus process in which Board members evaluate the strength of the evidence in the published articles and determine how the article should be included in the summary.

The lead reviewer for Adrenocortical Carcinoma Treatment is:

- Jaydira del Rivero, MD (National Cancer Institute)

Any comments or questions about the summary content should be submitted to Cancer.gov through the NCI website's Email Us (https://www.cancer.gov/contact/email-us). Do not contact the individual Board Members with questions or comments about the summaries. Board members will not respond to individual inquiries.

### Levels of Evidence

Some of the reference citations in this summary are accompanied by a level-of-evidence designation. These designations are intended to help readers assess the strength of the evidence supporting the use of specific interventions or approaches. The PDQ Adult Treatment Editorial Board uses a formal evidence ranking system in developing its level-of-evidence designations.

### Permission to Use This Summary

PDQ is a registered trademark. Although the content of PDQ documents can be used freely as text, it cannot be identified as an NCI PDQ cancer information summary unless it is presented in its entirety and is regularly updated. However, an author would be permitted to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks succinctly: [include excerpt from the summary].”

The preferred citation for this PDQ summary is:

PDQ® Adult Treatment Editorial Board. PDQ Adrenocortical Carcinoma Treatment. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/types/adrenocortical/hp/adrenocortical-treatment-pdq. Accessed <MM/DD/YYYY>. [PMID: 26389393]

Images in this summary are used with permission of the author(s), artist, and/or publisher for use within the PDQ summaries only. Permission to use images outside the context of PDQ information must be obtained from the owner(s) and cannot be granted by the National Cancer Institute. Information about using the illustrations in this summary, along with many other cancer-related images, is available in Visuals Online (https://visualsonline.cancer.gov/), a collection of over 2,000 scientific images.

### Disclaimer

Based on the strength of the available evidence, treatment options may be described as either “standard” or “under clinical evaluation.” These classifications should not be used as a basis for insurance reimbursement determinations. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s Email Us (https://www.cancer.gov/contact/email-us).